# Childhood Testicular Cancer (PDQ®)

Patient Version

This PDQ cancer information summary has current information about the treatment of childhood testicular cancer. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Pediatric Treatment Editorial Board.

## What is childhood testicular cancer?

Testicular tumors in children can form in the tissue of one or both testicles. These tumors can be benign (not cancer) or malignant (cancerous). Benign tumors do not spread to other parts of the body. However, they may grow and press on nearby tissues, causing discomfort or other problems. Malignant tumors may spread to other parts of the body. Benign tumors are more common in young boys and infants while malignant tumors are more common in boys who have gone through puberty.

The testicles are two egg-shaped glands in the male reproductive system. They are located inside the scrotum, a sac of loose skin that lies directly below the penis. The testicles are held within the scrotum by the spermatic cord, which contains the vas deferens, vessels, and nerves of the testicles. The testicles produce male hormones, such as testosterone, and sperm.

Anatomy of the male reproductive system. The male reproductive system is made up of organs and glands involved in making offspring (children). These include the vas deferens (a long tube that carries sperm out of the testes), prostate gland, penis, and testes.

Anatomy of the male reproductive system; drawing shows the vas deferens (a long tube that carries sperm out of the testes), prostate gland, penis, and testes.

## Types of testicular tumors

There are two types of testicular tumors.

- Non-germ cell tumors begin in the cells that produce hormones and in the tissue that surrounds and supports the testicles. These tumors may be benign or cancerous. Types of non-germ cell tumors include:
  - Juvenile granulosa cell tumors, which most often occur in young infants.
  - Sertoli cell tumors, which often occur in older infants.
  - Leydig cell tumors, which are more common in adolescents.
- Germ cell tumors begin in the sperm-producing cells of the testicles. Most childhood testicular tumors are germ cell tumors. Learn more about testicular germ cell tumors and their treatment at Childhood Extracranial Germ Cell Tumors Treatment.

## Causes and risk factors for childhood testicular cancer

Childhood testicular cancer is caused by certain changes to the way testicular cells function, especially how they grow and divide into new cells. Often, the exact cause of these cell changes is unknown. Learn more about how cancer develops at What Is Cancer? (https://www.cancer.gov/about-cancer/understanding/what-is-cancer)

A risk factor is anything that increases the chance of getting a disease. Not every child with one or more of these risk factors will develop testicular cancer. And it will develop in some children who don't have a known risk factor.

The risk of testicular cancer may be increased if your child has one of the following syndromes:

- DICER1 syndrome is a disorder that may cause a goiter, polyps in the colon, and tumors of the ovary, cervix, testicle, kidney, brain, eye, and lining of the lung.
- Peutz-Jeghers syndrome is a disorder that causes polyps to form in the intestines and dark spots to form on the mouth and fingers.
- Carney syndrome or complex is a disorder that causes dark spots on the skin and tumors to form in the heart, endocrine glands, skin, and nerves.

Talk with your child's doctor if you think your child may be at risk.

## Genetic counseling for children with testicular cancer

It may not be clear from the family medical history whether a child with testicular cancer has an inherited condition that increased their risk. Genetic counseling before genetic testing can help assess your child's risk of having a gene change that caused your child's tumor and whether genetic testing is needed. Genetic testing may help explain why a child develops a rare cancer or a cancer that is usually seen in adults, such as testicular cancer. Genetic counselors and other specially trained health professionals can discuss your child's diagnosis and your family's medical history to help you understand:

- the options for DICER1 gene testing
- the risk of other cancers for your child
- the risk of testicular cancer and other cancers for your child's siblings
- the risks and benefits of learning genetic information

Genetic counselors can also help you cope with your child's genetic testing results, including how to discuss the results with family members. They can advise you about whether other members of your family should receive genetic testing.

Learn more about Genetic Testing for Inherited Cancer Risk (https://www.cancer.gov/about-cancer/causes-prevention/genetics/genetic-testing-fact-sheet).

## Symptoms of childhood testicular cancer

Children may not have symptoms of testicular cancer until the tumor has grown bigger. It's important to check with your child's doctor if your child has:

- a painless lump in the testicles
- early signs of puberty
- enlarged breasts

These symptoms may be caused by problems other than childhood testicular cancer. The only way to know is to see your child's doctor.

## Tests to diagnose childhood testicular cancer

If your child has symptoms that suggest testicular cancer, the doctor will need to find out if these are due to cancer or another problem. The doctor will ask when the symptoms started and how often your child has been having them. They will also ask about your child's personal and family medical history and do a physical exam. Depending on these results, they may recommend other tests. If your child is diagnosed with testicular cancer, the results of these tests will help you and your child's doctor plan treatment.

The tests and procedures used to diagnose testicular cancer may include:

### Ultrasound exam

An ultrasound exam uses high-energy sound waves (ultrasound) that bounce off internal tissues or organs and make echoes. The echoes form a picture of body tissues called a sonogram.

### CT scan (CAT scan)

A CT scan uses a computer linked to an x-ray machine to make a series of detailed pictures of areas inside the body, such as the chest, abdomen, or pelvis. The pictures are taken from different angles and are used to create 3-D views of tissues and organs. A dye may be injected into a vein or swallowed to help the organs or tissues show up more clearly. This procedure is also called computed tomography, computerized tomography, or computerized axial tomography. Learn more about Computed Tomography (CT) Scans and Cancer (https://www.cancer.gov/about-cancer/diagnosis-staging/ct-scans-fact-sheet).

Computed tomography (CT) scan. The child lies on a table that slides through the CT scanner, which takes a series of detailed x-ray pictures of areas inside the body.

Computed tomography (CT) scan; drawing shows a child lying on a table that slides through the CT scanner, which takes a series of detailed x-ray pictures of areas inside the body.

### Magnetic resonance imaging (MRI)

MRI uses a magnet, radio waves, and a computer to make a series of detailed pictures of areas of the body, such as the chest, abdomen, or pelvis. This procedure is also called nuclear magnetic resonance imaging (NMRI).

Magnetic resonance imaging (MRI) scan. The child lies on a table that slides into the MRI machine, which takes a series of detailed pictures of areas inside the body. The positioning of the child on the table depends on the part of the body being imaged.

Magnetic resonance imaging (MRI) scan; drawing shows a child lying on a table that slides into the MRI machine, which takes a series of detailed pictures of areas inside the body.

### Chest x-ray

An x-ray is a type of radiation that can go through the body and make pictures. A chest x-ray makes pictures of the organs and bones inside the chest.

### Biopsy

A biopsy is a procedure in which a sample of tissue is removed from the tumor so that a pathologist can view it under a microscope to check for signs of cancer.

### Serum tumor marker test

A serum tumor marker test examines a sample of blood to measure the amounts of certain substances released into the blood by organs, tissues, or tumor cells in the body. Certain substances are linked to specific types of cancer when found in increased levels in the blood. These are called tumor markers. If an increased level of the tumor marker alpha-fetoprotein is found in the blood, it means the patient has a testicular germ cell tumor, not a testicular non-germ cell tumor.

### DICER1 genetic testing

DICER1 genetic testing examines a sample of blood or saliva for changes in the DICER1 gene.

## Getting a second opinion

You may want to get a second opinion to confirm your child's testicular cancer diagnosis and treatment plan. If you seek a second opinion, you will need to get medical test results and reports from the first doctor to share with the second doctor. The second doctor will review the genetic test results, pathology report, slides, and scans. This doctor may agree with the first doctor, suggest changes to the treatment plan, or provide more information about your child's cancer.

To learn more about choosing a doctor and getting a second opinion, see Finding Cancer Care (https://www.cancer.gov/about-cancer/managing-care/finding-cancer-care). You can contact NCI’s Cancer Information Service (https://www.cancer.gov/contact) via chat, email, or phone (both in English and Spanish) for help finding a doctor or hospital that can provide a second opinion. For questions you might want to ask at your child’s appointments, see Questions to Ask Your Doctor about Cancer (https://www.cancer.gov/about-cancer/coping/questions).

## Who treats children with testicular cancer?

A pediatric oncologist, a doctor who specializes in treating children with cancer, oversees treatment for testicular cancer. The pediatric oncologist works with other health care providers who are experts in treating children with cancer and who specialize in certain areas of medicine. Other specialists may include:

- pediatrician
- pediatric surgeon
- pediatric urologist
- pathologist
- pediatric nurse specialist
- rehabilitation specialist
- social worker
- psychologist
- fertility specialist

## Treatment of childhood testicular cancer

There are different types of treatment for children and adolescents with testicular cancer. You and your child's cancer care team will work together to decide treatment. Many factors will be considered, such as your child's overall health and whether the cancer is newly diagnosed or has come back.

Your child's treatment plan will include information about the cancer, the goals of treatment, treatment options, and the possible side effects. It will be helpful to talk with your child's cancer care team before treatment begins about what to expect. For help every step of the way, see our booklet, Children with Cancer: A Guide for Parents (https://www.cancer.gov/publications/patient-education/guide-for-parents).

Treatment for non-germ cell testicular cancer in children is usually surgery to remove the tumor. In some cases, the entire testicle with cancer may need to be removed.

If the cancer comes back after treatment, your child's doctor will talk with you about what to expect and possible next steps. There may be treatment options to shrink the cancer or control its growth. If there are no treatment options, your child can receive care to control symptoms from cancer so they can be as comfortable as possible.

## Clinical trials

For some children, joining a clinical trial may be an option. There are different types of clinical trials for childhood cancer. For example, a treatment trial tests new treatments or new ways of using current treatments. Supportive care and palliative care trials look at ways to improve quality of life, especially for those who have side effects from cancer and its treatment.

You can use the clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials accepting participants. The search allows you to filter trials based on the type of cancer, your child's age, and where the trials are being done. Clinical trials supported by other organizations can be found on the ClinicalTrials.gov website.

Learn more about clinical trials, including how to find and join one, at Clinical Trials Information for Patients and Caregivers (https://www.cancer.gov/research/participate/clinical-trials).

## Prognosis for childhood testicular cancer

If your child has been diagnosed with testicular cancer, you likely have questions about how serious the cancer is and your child's chances of survival. The likely outcome or course of a disease is called prognosis. In children, the prognosis for testicular cancer is usually excellent after surgery to remove the tumor.

## Side effects and late effects of treatment

Cancer treatments can cause side effects. Which side effects your child might have depends on the type of treatment they receive, the dose, and how their body reacts. Talk with your child's treatment team about which side effects to look for and ways to manage them.

To learn more about side effects that begin during treatment for cancer, visit Side Effects (https://www.cancer.gov/about-cancer/treatment/side-effects).

Problems from cancer treatment that begin 6 months or later after treatment and continue for months or years are called late effects. Physical problems, such as problems with fertility, are a late effect of treatment.

Some late effects may be treated or controlled. It is important to talk with your child's doctors about the possible late effects caused by some treatments. Learn more about Late Effects of Treatment for Childhood Cancer.

## Follow-up care

As your child goes through treatment, they will have follow-up tests or check-ups. Some of the tests that were done to diagnose the cancer may be repeated to see how well the treatment is working. Decisions about whether to continue, change, or stop treatment may be based on the results of these tests.

Some of the tests will continue to be done from time to time after treatment has ended. The results of these tests can show if your child's condition has changed or if the cancer has recurred (come back).

## Coping with your child's cancer

When a child has cancer, every member of the family needs support. Taking care of yourself during this difficult time is important. Reach out to your child's treatment team and to people in your family and community for support. To learn more, see Support for Families: Childhood Cancer (https://www.cancer.gov/about-cancer/coping/caregiver-support/parents) and the booklet Children with Cancer: A Guide for Parents (https://www.cancer.gov/publications/patient-education/guide-for-parents).

## Related resources

For more childhood cancer information and other general cancer resources, see:

- Testicular Cancer Home Page (https://www.cancer.gov/types/testicular)
- About Cancer (https://www.cancer.gov/about-cancer)
- Childhood Cancers (https://www.cancer.gov/types/childhood-cancers)
- CureSearch for Children's Cancer (https://curesearch.org)
- Adolescents and Young Adults with Cancer (https://www.cancer.gov/types/aya)
- Cancer in Children and Adolescents (https://www.cancer.gov/types/childhood-cancers/child-adolescent-cancers-fact-sheet)
- For Survivors and Caregivers (https://cancercontrol.cancer.gov/ocs/resources/survivors.html)

## About This PDQ Summary

### About PDQ

Physician Data Query (PDQ) is the National Cancer Institute's (NCI's) comprehensive cancer information database. The PDQ database contains summaries of the latest published information on cancer prevention, detection, genetics, treatment, supportive care, and complementary and alternative medicine. Most summaries come in two versions. The health professional versions have detailed information written in technical language. The patient versions are written in easy-to-understand, nontechnical language. Both versions have cancer information that is accurate and up to date and most versions are also available in Spanish (https://www.cancer.gov/espanol/publicaciones/pdq).

PDQ is a service of the NCI. The NCI is part of the National Institutes of Health (NIH). NIH is the federal government’s center of biomedical research. The PDQ summaries are based on an independent review of the medical literature. They are not policy statements of the NCI or the NIH.

### Purpose of This Summary

This PDQ cancer information summary has current information about the treatment of childhood testicular cancer. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

### Reviewers and Updates

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Updated") is the date of the most recent change.

The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Pediatric Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/pediatric-treatment).

### Clinical Trial Information

A clinical trial is a study to answer a scientific question, such as whether one treatment is better than another. Trials are based on past studies and what has been learned in the laboratory. Each trial answers certain scientific questions in order to find new and better ways to help cancer patients. During treatment clinical trials, information is collected about the effects of a new treatment and how well it works. If a clinical trial shows that a new treatment is better than one currently being used, the new treatment may become "standard." Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

Clinical trials can be found online at NCI's website (https://www.cancer.gov/research/participate/clinical-trials). For more information, call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, at 1-800-4-CANCER (1-800-422-6237).

### Permission to Use This Summary

PDQ is a registered trademark. The content of PDQ documents can be used freely as text. It cannot be identified as an NCI PDQ cancer information summary unless the whole summary is shown and it is updated regularly. However, a user would be allowed to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks in the following way: [include excerpt from the summary].”

The best way to cite this PDQ summary is:

PDQ® Pediatric Treatment Editorial Board. PDQ Childhood Testicular Cancer. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/testicular/patient/child-testicular-treatment-pdq. Accessed <MM/DD/YYYY>.

Images in this summary are used with permission of the author(s), artist, and/or publisher for use in the PDQ summaries only. If you want to use an image from a PDQ summary and you are not using the whole summary, you must get permission from the owner. It cannot be given by the National Cancer Institute. Information about using the images in this summary, along with many other images related to cancer can be found in Visuals Online (https://visualsonline.cancer.gov/). Visuals Online is a collection of more than 3,000 scientific images.

### Disclaimer

The information in these summaries should not be used to make decisions about insurance reimbursement. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s E-mail Us (https://www.cancer.gov/contact/email-us).